# Agnostic Cancer Therapies (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about agnostic therapies for cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

The U.S. Food and Drug Administration (FDA) has approved both gene- and immune-targeted drugs for tissue-agnostic, genomic biomarker–based indications in patients with lethal solid tumors and blood cancers. High response rates were the basis for these approvals.[1]

Precision medicine has rapidly changed the oncology field. Next-generation sequencing can identify patients with specific gene alterations or immune markers for which there are targeted therapies. Biomarker-based treatments are increasingly emerging, and the FDA has approved the following tissue-agnostic therapies:[1,2]

- Pembrolizumab.
- Dostarlimab.
- Entrectinib.
- Larotrectinib.
- Repotrectinib.
- Dabrafenib in combination with trametinib.
- Selpercatinib.
- Pemigatinib.
- Trastuzumab deruxtecan.

Precision medicine is constantly evolving, and improved diagnostic tools allow for more comprehensive genomic definition of the tumor. Tissue-agnostic targeted therapies are a promising treatment strategy tailored to the specific tumor genomic profile, leading to improved patient survival outcomes.

The list of drugs approved for tumors with genomic alterations will likely expand as understanding of the science driving these cancers continues to advance. As oncology drug development continues to move rapidly, the location where the cancer originated will become less critical.

Companion tests can determine the presence of specific genomic alterations or immune markers. These tests may have been approved by the FDA as part of the agnostic drug approval. Most insurance companies have not required these specific tests before covering the prescribed medications.

### References

Adashek JJ, Kato S, Sicklick JK, et al.: Considering molecular alterations as pan-cancer tissue-agnostic targets. Nat Cancer 4 (12): 1622-1626, 2023.38102355
Tateo V, Marchese PV, Mollica V, et al.: Agnostic Approvals in Oncology: Getting the Right Drug to the Right Patient with the Right Genomics. Pharmaceuticals (Basel) 16 (4): , 2023.37111371

## Microsatellite Instability–High or Mismatch Repair–Deficient Solid Tumors

### Pembrolizumab

Indication. Pembrolizumab is indicated for adult and pediatric patients with unresectable or metastatic, microsatellite instability–high (MSI-H)/microsatellite unstable or mismatch repair–deficient (dMMR) solid tumors whose disease progressed after prior treatment and who have no satisfactory alternative treatment options. The MSI-H phenotype is associated with germline defects in the MLH1, MSH2, MSH6, and PMS2 genes and is the primary phenotype observed in tumors from patients with hereditary nonpolyposis colorectal cancer or Lynch syndrome. Patients can also have the MSI-H phenotype because one of these genes was silenced via DNA methylation. Molecular genetic tests look for microsatellite instability in the tumor tissue, and immunohistochemistry tests for the loss of mismatch repair proteins. For more information, see the Immunotherapy section in Colon Cancer Treatment.

Evidence. The U.S. Food and Drug Administration (FDA) approval was based on data from the following five uncontrolled, multicohort, multicenter, single-arm clinical trials that included 149 patients with MSI-H or dMMR cancers:[1][Level of evidence C3]

- KEYNOTE-016 (https://www.cancer.gov/clinicaltrials/NCT01876511) (NCT01876511) (median follow-up, 5.3 months).[2]
- KEYNOTE-164 (https://www.cancer.gov/clinicaltrials/NCT02460198) (NCT02460198) (median follow-up, 31.3 months).[3]
- KEYNOTE-012 (https://www.cancer.gov/clinicaltrials/NCT01848834) (NCT01848834) (median follow-up, 9 months).[4]
- KEYNOTE-028 (https://www.cancer.gov/clinicaltrials/NCT02054806) (NCT02054806) (median follow-up, 9.8 months).[5]
- KEYNOTE-158 (https://www.cancer.gov/clinicaltrials/NCT02628067) (NCT02628067) (median follow-up, 13.4 months).[6]

These trials included 90 patients with colorectal cancer and 59 patients with other cancers who were diagnosed with one of 14 other cancer types. Patients received either 200 mg of pembrolizumab every 3 weeks or 10 mg/kg of pembrolizumab every 2 weeks.

Efficacy. The major efficacy outcome measures were objective response rate, assessed by blinded independent central radiologist review according to RECIST 1.1, and response duration. The pooled objective response rate was 39.6%. A total of 11 patients (7.4%) had a complete response and 48 patients (32.2%) had a partial response. The objective response rate was 36% in patients with colorectal cancer, and 46% in patients with other cancers (95% confidence interval [CI], 33%–59%).[7,8] Responses lasted 6 months or longer for 78% of patients who responded to pembrolizumab.[1]

Identification of biomarker. For most patients (135 of 149), tumor status was prospectively determined using local laboratory-developed, investigational polymerase chain reaction (PCR) (for MSI-H) or immunohistochemistry (for dMMR).[9] For 14 of the 149 patients, MSI-H status was determined in a retrospective assessment of tumor samples from 415 patients using a central laboratory-developed PCR test.

### Dostarlimab

Indication. Dostarlimab is indicated for adult patients with dMMR recurrent or advanced solid tumors, as determined by an FDA-approved test, whose disease progressed during or after prior treatment and who have no satisfactory alternative treatment options. This indication is not approved in the pediatric population.

Evidence. GARNET (https://www.cancer.gov/clinicaltrials/NCT02715284) (NCT02715284) was a nonrandomized, multicenter, open-label, multicohort trial that evaluated the efficacy of dostarlimab.[10] The expansion cohorts were as follows:[11-14][Level of evidence C3]

1. dMMR/MSI-H endometrial cancers.
2. Mismatch repair–proficient or microsatellite stable endometrial cancers.
3. Non-small cell lung cancers.
4. Non-endometrial dMMR/MSI-H and POLE-mutated cancers.
5. High-grade serous, endometrioid, or clear cell ovarian, fallopian tube, or primary peritoneal cancer without BRCA variants.

Efficacy. The efficacy population consisted of 209 patients with dMMR recurrent or advanced solid tumors whose disease progressed after systemic therapy and who had no satisfactory alternative treatment options. The objective response rate was 41.6% (95% CI, 34.9%–48.6%), with a 9.1% complete response rate and a 32.5% partial response rate. The median follow-up was 27.7 months.[10]

Identification of biomarker. The VENTANA MMR RxDx Panel is a companion diagnostic device to select patients with dMMR solid tumors for treatment with dostarlimab.

### References

Marcus L, Lemery SJ, Keegan P, et al.: FDA Approval Summary: Pembrolizumab for the Treatment of Microsatellite Instability-High Solid Tumors. Clin Cancer Res 25 (13): 3753-3758, 2019.30787022
O'Neil BH, Wallmark JM, Lorente D, et al.: Safety and antitumor activity of the anti-PD-1 antibody pembrolizumab in patients with advanced colorectal carcinoma. PLoS One 12 (12): e0189848, 2017.29284010
Le DT, Kim TW, Van Cutsem E, et al.: Phase II Open-Label Study of Pembrolizumab in Treatment-Refractory, Microsatellite Instability-High/Mismatch Repair-Deficient Metastatic Colorectal Cancer: KEYNOTE-164. J Clin Oncol 38 (1): 11-19, 2020.31725351
Mehra R, Seiwert TY, Gupta S, et al.: Efficacy and safety of pembrolizumab in recurrent/metastatic head and neck squamous cell carcinoma: pooled analyses after long-term follow-up in KEYNOTE-012. Br J Cancer 119 (2): 153-159, 2018.29955135
Ott PA, Elez E, Hiret S, et al.: Pembrolizumab in Patients With Extensive-Stage Small-Cell Lung Cancer: Results From the Phase Ib KEYNOTE-028 Study. J Clin Oncol 35 (34): 3823-3829, 2017.28813164
Marabelle A, Le DT, Ascierto PA, et al.: Efficacy of Pembrolizumab in Patients With Noncolorectal High Microsatellite Instability/Mismatch Repair-Deficient Cancer: Results From the Phase II KEYNOTE-158 Study. J Clin Oncol 38 (1): 1-10, 2020.31682550
Lemery S, Keegan P, Pazdur R: First FDA Approval Agnostic of Cancer Site - When a Biomarker Defines the Indication. N Engl J Med 377 (15): 1409-1412, 2017.29020592
Boyiadzis MM, Kirkwood JM, Marshall JL, et al.: Significance and implications of FDA approval of pembrolizumab for biomarker-defined disease. J Immunother Cancer 6 (1): 35, 2018.29754585
Ren XY, Song Y, Wang J, et al.: Mismatch Repair Deficiency and Microsatellite Instability in Triple-Negative Breast Cancer: A Retrospective Study of 440 Patients. Front Oncol 11: 570623, 2021.33747906
André T, Berton D, Curigliano G, et al.: Antitumor Activity and Safety of Dostarlimab Monotherapy in Patients With Mismatch Repair Deficient Solid Tumors: A Nonrandomized Controlled Trial. JAMA Netw Open 6 (11): e2341165, 2023.37917058
Moreno V, Roda D, Pikiel J, et al.: Safety and Efficacy of Dostarlimab in Patients With Recurrent/Advanced Non-small Cell Lung Cancer: Results from Cohort E of the Phase I GARNET Trial. Clin Lung Cancer 23 (7): e415-e427, 2022.35729005
Oaknin A, Gilbert L, Tinker AV, et al.: Safety and antitumor activity of dostarlimab in patients with advanced or recurrent DNA mismatch repair deficient/microsatellite instability-high (dMMR/MSI-H) or proficient/stable (MMRp/MSS) endometrial cancer: interim results from GARNET-a phase I, single-arm study. J Immunother Cancer 10 (1): , 2022.35064011
Berton D, Banerjee SN, Curigliano G, et al.: Antitumor activity of dostarlimab in patients with mismatch repair-deficient/microsatellite instability–high tumors: A combined analysis of two cohorts in the GARNET study. [Abstract] J Clin Oncol 39 (Suppl 15): A-2564, 2021.
Andre T, Berton D, Curigliano G, et al.: Efficacy and safety of dostarlimab in patients (pts) with mismatch repair deficient (dMMR) solid tumors: Analysis of 2 cohorts in the GARNET study. [Abstract] J Clin Oncol 40 (Suppl 16): A-2587, 2022.

## Tumor Mutational Burden–High (≥10 Mutations/Megabase) Solid Tumors

### Pembrolizumab

Indication. Pembrolizumab is indicated for adult and pediatric patients with unresectable or metastatic tumor mutational burden–high (TMB-H) solid tumors, whose disease progressed after prior treatment and who have no satisfactory alternative treatment options. TMB-H is defined as ≥10 mutations/megabase (mut/Mb), as determined by a U.S. Food and Drug Administration (FDA)-approved test.

Evidence. FDA approval was based on a retrospective analysis of 10 cohorts of patients with various previously treated unresectable or metastatic TMB-H solid tumors enrolled in KEYNOTE-158 (https://www.cancer.gov/clinicaltrials/NCT02628067) (NCT02628067), a multicenter, nonrandomized, open-label trial. Patients received 200 mg of pembrolizumab intravenously every 3 weeks until unacceptable toxicity or documented disease progression.[1,2][Level of evidence C3]

Efficacy. A total of 102 patients (13%) had TMB-H tumors (defined as TMB ≥10 mut/Mb). The objective response rate for these patients was 29% (95% confidence interval, 21%–39%), with a 4% complete response rate and 25% partial response rate.[1] The median follow-up was 13.4 months.[2]

Identification of biomarker. The FoundationOne CDx assay is a companion diagnostic test for pembrolizumab.

### References

Marabelle A, Fakih M, Lopez J, et al.: Association of tumour mutational burden with outcomes in patients with advanced solid tumours treated with pembrolizumab: prospective biomarker analysis of the multicohort, open-label, phase 2 KEYNOTE-158 study. Lancet Oncol 21 (10): 1353-1365, 2020.32919526
Marabelle A, Le DT, Ascierto PA, et al.: Efficacy of Pembrolizumab in Patients With Noncolorectal High Microsatellite Instability/Mismatch Repair-Deficient Cancer: Results From the Phase II KEYNOTE-158 Study. J Clin Oncol 38 (1): 1-10, 2020.31682550

## NTRK Gene Fusion–Positive Solid Tumors

### Entrectinib

Indication. Entrectinib is indicated for adult and pediatric patients with solid tumors and an NTRK gene fusion without a known acquired resistance variant; with disease that is metastatic or where surgical resection is likely to result in severe morbidity; and who have disease progression after treatment or have no satisfactory standard therapy.

Evidence. Five multicenter single-arm clinical trials evaluated the efficacy of entrectinib in patients with NTRK-positive tumors. Three of these trials evaluated a total of 54 adult patients who received entrectinib at various doses and schedules. Two of these trials evaluated a total of 33 pediatric patients.[1,2][Level of evidence C3]

- ALKA-372-001 (https://www.cancer.gov/clinicaltrials/NCT02097810); adult patients.
- STARTRK-1 (https://www.cancer.gov/clinicaltrials/NCT02097810) (NCT02097810); adult patients.
- STARTRK-2 (https://www.cancer.gov/clinicaltrials/NCT02568267) (NCT02568267); adult patients.
- STARTRK-NG (https://www.cancer.gov/clinicaltrials/NCT02650401) (NCT02650401); pediatric patients.
- TAPISTRY (https://www.cancer.gov/clinicaltrials/NCT04589845) (NCT04589845); pediatric patients.

Efficacy. Among the 54 adult patients, the overall response rate, as determined by independent review, was 57% (95% confidence interval [CI], 43%–71%). The median follow-up was 15 months.[1] Among the 33 pediatric patients, the objective response rate was 70% (95% CI, 51%–84%), and the median duration of response was 25.4 months (95% CI, 14.3–not evaluable). The median follow-up was not defined.[2]

Identification of biomarker. Identification of positive NTRK gene fusion status was determined at local laboratories or a central laboratory using nucleic acid-based tests prior to enrollment. Not all NTRK variants are gene fusions. Entrectinib has not shown clinical efficacy in patients with nonfusion NTRK variants..

### Larotrectinib

Indication. Larotrectinib is indicated for adult and pediatric patients with solid tumors and an NTRK gene fusion without a known acquired resistance variant; with disease that is metastatic or where surgical resection is likely to result in severe morbidity; and who have disease progression after treatment and have no satisfactory alternative treatment options.

Evidence. U.S. Food and Drug Administration (FDA) approval was based on data from three multicenter, open-label, single-arm clinical trials: LOXO-TRK-14001 (https://www.cancer.gov/clinicaltrials/NCT02122913) (NCT02122913), SCOUT (https://www.cancer.gov/clinicaltrials/NCT02637687) (NCT02637687), and NAVIGATE (https://www.cancer.gov/clinicaltrials/NCT02576431) (NCT02576431).[3,4][Level of evidence C3]

Efficacy. Among 55 patients with unresectable or metastatic solid tumors harboring an NTRK gene fusion enrolled across the three trials, the overall response rate was 75% (95% CI, 61%–85%). The complete response rate was 22%, and the partial response rate was 53%. The median follow-up was 8.3 months.[3,5]

Identification of biomarker. NTRK gene fusion status was prospectively determined at local laboratories using next-generation sequencing (NGS) or fluorescence in situ hybridization (FISH). Not all NTRK variants are gene fusions. Entrectinib has not shown clinical efficacy in patients with nonfusion NTRK variants..

### Repotrectinib

Indication. Repotrectinib is indicated for adult and pediatric patients with an NTRK gene fusion and solid tumors that are locally advanced or metastatic for which surgical resection may cause severe morbidity.

Evidence. FDA approval was based on data from TRIDENT-1 (https://www.cancer.gov/clinicaltrials/NCT03093116) (NCT03093116), a multicenter, single-arm, open-label, multicohort trial.[6-8][Level of evidence C3]

Efficacy. In 88 adult patients with locally advanced or metastatic NTRK gene fusion–positive solid tumors, the overall response rate was 58% (95% CI, 41%–73%) for patients who had not received prior NTRK tyrosine kinase inhibitors (TKIs) (n = 40) and 50% (95% CI, 35%–65%) for patients who had previously received NTRK TKIs (n = 48). The median duration of response was not estimable in the TKI-naïve group and was 9.9 months (95% CI, 7.4–13.0) in the TKI-pretreated group. The median follow-up was 24.0 months.[6,8]

Identification of biomarker. NTRK gene fusion status was prospectively determined at local laboratories using NGS, Sanger sequencing, reverse transcription–polymerase chain reaction, or FISH. Not all NTRK variants are gene fusions. Repotrectinib has not shown clinical efficacy in patients with nonfusion NTRK variants.

### References

Drilon A, Siena S, Ou SI, et al.: Safety and Antitumor Activity of the Multitargeted Pan-TRK, ROS1, and ALK Inhibitor Entrectinib: Combined Results from Two Phase I Trials (ALKA-372-001 and STARTRK-1). Cancer Discov 7 (4): 400-409, 2017.28183697
Desai AV, Robinson GW, Gauvain K, et al.: Entrectinib in children and young adults with solid or primary CNS tumors harboring NTRK, ROS1, or ALK aberrations (STARTRK-NG). Neuro Oncol 24 (10): 1776-1789, 2022.35395680
Drilon A, Laetsch TW, Kummar S, et al.: Efficacy of Larotrectinib in TRK Fusion-Positive Cancers in Adults and Children. N Engl J Med 378 (8): 731-739, 2018.29466156
Laetsch TW, DuBois SG, Mascarenhas L, et al.: Larotrectinib for paediatric solid tumours harbouring NTRK gene fusions: phase 1 results from a multicentre, open-label, phase 1/2 study. Lancet Oncol 19 (5): 705-714, 2018.29606586
U.S. Food and Drug Administration: FDA approves larotrectinib for solid tumors with NTRK gene fusions. U.S. Food and Drug Administration, 2018. Available online (https://www.fda.gov/drugs/fda-approves-larotrectinib-solid-tumors-ntrk-gene-fusions). Last accessed January 30, 2025.
Drilon A, Camidge DR, Lin JJ, et al.: Repotrectinib in ROS1 Fusion-Positive Non-Small-Cell Lung Cancer. N Engl J Med 390 (2): 118-131, 2024.38197815
Solomon BJ, Drilon A, Lin JJ, et al.: Repotrectinib in patients (pts) with NTRK fusion-positive (NTRK+) advanced solid tumors, including NSCLC: Update from the phase I/II TRIDENT-1 trial. [Abstract] Ann Oncol 34 (Suppl 2): A-787-788, 2023.
U.S. Food and Drug Administration: FDA grants accelerated approval to repotrectinib for adult and pediatric patients with NTRK gene fusion-positive solid tumors. U.S. Food and Drug Administration, 2024. Available online (https://www.fda.gov/drugs/resources-information-approved-drugs/fda-grants-accelerated-approval-repotrectinib-adult-and-pediatric-patients-ntrk-gene-fusion-positive). Last accessed January 23, 2025.

## BRAF V600E Variant–Positive Solid Tumors

### Dabrafenib in Combination With Trametinib

Indication. The combination of dabrafenib and trametinib is indicated for adult and pediatric patients aged 6 years or older with unresectable or metastatic solid tumors and a BRAF V600E variant. Patients must have progressive disease after prior treatment and have no satisfactory alternative treatment options. Dabrafenib in combination with trametinib is not indicated for patients with colorectal cancer because of known intrinsic resistance to BRAF inhibition.

Evidence. The U.S. Food and Drug Administration approval was based on data from the following populations:[1-5][Level of evidence C3]

- Two open-label multiple cohort trials included 131 adult patients: BRF117019 (https://www.cancer.gov/clinicaltrials/NCT02034110) (NCT02034110) (median follow-up, 47 weeks), and NCI-MATCH (https://www.cancer.gov/clinicaltrials/NCT02465060) (NCT02465060) protocol H (median follow-up, 23.0 months).[1-3]
- One trial included 36 pediatric patients: CTMT212X2101 (https://www.cancer.gov/clinicaltrials/NCT02124772) (NCT02124772) (median follow-up, not defined).[4]

The approval was also supported by results from COMBI-d (https://www.cancer.gov/clinicaltrials/NCT01072175) (NCT01072175), COMBI-v (https://www.cancer.gov/clinicaltrials/NCT01597908) (NCT01597908), and BRF113928 (https://www.cancer.gov/clinicaltrials/NCT01336634) (NCT01336634).[6]

Efficacy. For the 131 adult patients, the overall response rate was 41% (95% confidence interval [CI], 33%–50%). For the 36 pediatric patients, the overall response rate was 25% (95% CI, 12%–42%).[5]

Identification of biomarker. Biomarker status was determined at a Clinical Laboratory Improvement Amendments (CLIA) or CLIA-equivalent laboratory.

### References

Subbiah V, Lassen U, Élez E, et al.: Dabrafenib plus trametinib in patients with BRAFV600E-mutated biliary tract cancer (ROAR): a phase 2, open-label, single-arm, multicentre basket trial. Lancet Oncol 21 (9): 1234-1243, 2020.32818466
Wen PY, Stein A, van den Bent M, et al.: Dabrafenib plus trametinib in patients with BRAFV600E-mutant low-grade and high-grade glioma (ROAR): a multicentre, open-label, single-arm, phase 2, basket trial. Lancet Oncol 23 (1): 53-64, 2022.34838156
Salama AKS, Li S, Macrae ER, et al.: Dabrafenib and Trametinib in Patients With Tumors With BRAFV600E Mutations: Results of the NCI-MATCH Trial Subprotocol H. J Clin Oncol 38 (33): 3895-3904, 2020.32758030
Whitlock JA, Geoerger B, Dunkel IJ, et al.: Dabrafenib, alone or in combination with trametinib, in BRAF V600-mutated pediatric Langerhans cell histiocytosis. Blood Adv 7 (15): 3806-3815, 2023.36884302
U.S. Food and Drug Administration: FDA grants accelerated approval to dabrafenib in combination with trametinib for unresectable or metastatic solid tumors with BRAF V600E mutation. U.S. Food and Drug Administration, 2022. Available online (https://www.fda.gov/drugs/resources-information-approved-drugs/fda-grants-accelerated-approval-dabrafenib-combination-trametinib-unresectable-or-metastatic-solid). Last accessed January 30, 2025.
Robert C, Grob JJ, Stroyakovskiy D, et al.: Five-Year Outcomes with Dabrafenib plus Trametinib in Metastatic Melanoma. N Engl J Med 381 (7): 626-636, 2019.31166680

## RET Gene Fusion–Positive Solid Tumors

### Selpercatinib

Indication. Selpercatinib is indicated for adult patients with locally advanced or metastatic solid tumors with a RET gene fusion whose disease meets either of the following criteria: disease progressed during or after prior systemic treatment, or disease with no satisfactory alternative treatment options. This indication is not approved for the pediatric population.

Evidence. Forty-one patients with RET gene fusion–positive tumors (other than non-small cell lung cancer [NSCLC] and thyroid cancer) with disease progression during or after prior systemic treatment or who had no satisfactory alternative treatment options were evaluated in the multicenter, open-label, multicohort LIBRETTO-001 (https://www.cancer.gov/clinicaltrials/NCT03157128) trial (NCT03157128).[1,2][Level of evidence C3]

Efficacy. For the 41 evaluable patients with cancers other than NSCLC or thyroid cancer, the objective response rate was 44% (95% confidence interval, 28%–60%). A total of 16 patients had a partial response and 2 patients had a complete response, with a median follow-up of 14.9 months.[1,2]

Identification of biomarker. Clinical Laboratory Improvement Amendments (CLIA) or CLIA-equivalent locally obtained molecular testing was performed at a certified laboratory, with the use of either next-generation sequencing, fluorescence in situ hybridization, or polymerase chain reaction assay.

### References

Subbiah V, Wolf J, Konda B, et al.: Tumor agnostic efficacy of selpercatinib in patients with RET fusion+ solid tumors: A global, multicenter, registrational trial update (LIBRETTO-001). [Abstract] J Clin Oncol 40 (Suppl 16): A-3094, 2022.
Subbiah V, Wolf J, Konda B, et al.: Tumour-agnostic efficacy and safety of selpercatinib in patients with RET fusion-positive solid tumours other than lung or thyroid tumours (LIBRETTO-001): a phase 1/2, open-label, basket trial. Lancet Oncol 23 (10): 1261-1273, 2022.36108661

## FGFR1-Rearranged Myeloid/Lymphoid Neoplasms

### Pemigatinib

Indication. Pemigatinib is indicated for adult patients with relapsed or refractory myeloid/lymphoid neoplasms (MLNs) with an FGFR1 rearrangement. This indication is not approved for the pediatric population.

Evidence. Twenty-eight patients with relapsed or refractory MLNs with FGFR1 rearrangement were evaluated in the multicenter open-label, single-arm FIGHT-203 (https://www.cancer.gov/clinicaltrials/NCT03011372) trial (NCT03011372). Eligible patients were either not candidates for, or had relapsed disease after, allogeneic hematopoietic stem cell transplant or a disease-modifying therapy (e.g., chemotherapy).[1,2][Level of evidence C3]

Efficacy. For all 28 patients (including three patients without evidence of morphologic disease), the complete cytogenetic response rate was 79% (95% confidence interval [CI], 59%–92%). Among the 18 patients with chronic phase disease in the marrow with or without extramedullary disease (EMD), 14 achieved a complete response (78%; 95% CI, 52%–94%). Among the four patients with blast-phase disease in the marrow with or without EMD, two achieved a complete response (duration, 1+ and 94 days). For the three patients with EMD only, one achieved a complete response (duration, 64+ days) with a median follow-up of 25.3 months.[1,2]

Identification of biomarker. Biomarker identification was performed using local cytogenetics and both local and central fluorescence in situ hybridization results.

### References

Verstovsek S, Gotlib J, Vannucchi AM, et al.: FIGHT-203, an ongoing phase 2 study of pemigatinib in patients with myeloid/lymphoid neoplasms (MLNs) with fibroblast growth factor receptor 1 (FGFR1) rearrangement (MLNFGFR1): A focus on centrally reviewed clinical and cytogenetic responses in previously treated patients. [Abstract] Blood 140 (Suppl 1): A-624, 3980-2, 2022.
Gotlib J, Kiladjian J, Vannucchi A, et al.: A phase 2 study of pemigatinib (FIGHT-203; INCB054828) in patients with myeloid/lymphoid neoplasms (MLNs) with fibroblast growth factor receptor 1 (FGFR1) rearrangement (MLNFGFR1). [Abstract] Blood 138 (Suppl 1): A-634, 385, 2021.

## HER2–Expressing Solid Tumors

### Trastuzumab Deruxtecan (T-DXd)

Indication. T-DXd is indicated for adult patients with unresectable or metastatic HER2-positive (immunohistochemistry [IHC] 3+) solid tumors who have received prior systemic treatment and have no satisfactory alternative treatment options.[1] This indication is not approved in the pediatric population.

Evidence. One hundred ninety-two adult patients with previously treated unresectable or metastatic HER2-positive (IHC 3+) solid tumors were enrolled in one of the following three multicenter trials:[2-4][Level of evidence C3]

- DESTINY-PanTumor02 (https://www.cancer.gov/clinicaltrials/NCT04482309) (NCT04482309).[2]
- DESTINY-Lung01 (https://www.cancer.gov/clinicaltrials/NCT03505710) (NCT03505710).[3]
- DESTINY-CRC02 (https://www.cancer.gov/clinicaltrials/NCT04744831) (NCT04744831).[4]

Efficacy. The objective response rates were as follows:

- 51.4% (95% confidence interval [CI], 41.7%–61.0%) for patients in the DESTINY-PanTumor02 trial.
- 52.9% (95% CI, 27.8%–77.0%) for patients in the DESTINY-Lung01 trial.
- 46.9% (95% CI, 34.3%–59.8%) for patients in the DESTINY-CRC02 trial.

Identification of biomarker. Eligible patients had centrally confirmed HER2 positivity (IHC 3+).

### References

U.S. Food and Drug Administration: FDA grants accelerated approval to fam-trastuzumab deruxtecan-nxki for unresectable or metastatic HER2-positive solid tumors. U.S. Food and Drug Administration, 2024. Available online (https://www.fda.gov/drugs/resources-information-approved-drugs/fda-grants-accelerated-approval-fam-trastuzumab-deruxtecan-nxki-unresectable-or-metastatic-her2). Last accessed January 30, 2025.
Meric-Bernstam F, Makker V, Oaknin A, et al.: Efficacy and Safety of Trastuzumab Deruxtecan in Patients With HER2-Expressing Solid Tumors: Primary Results From the DESTINY-PanTumor02 Phase II Trial. J Clin Oncol 42 (1): 47-58, 2024.37870536
Li BT, Smit EF, Goto Y, et al.: Trastuzumab Deruxtecan in HER2-Mutant Non-Small-Cell Lung Cancer. N Engl J Med 386 (3): 241-251, 2022.34534430
Raghav KPS, Siena S, Takashima A, et al.: Trastuzumab deruxtecan (T-DXd) in patients (pts) with HER2-overexpressing/amplified (HER2+) metastatic colorectal cancer (mCRC): Primary results from the multicenter, randomized, phase 2 DESTINY-CRC02 study. [Abstract] J Clin Oncol 41 (Suppl 16): A-3501, 2023.

## Potential Emerging Agnostic Targets Not Yet Approved by the U.S. Food and Drug Administration

### Tumor Mutational Burden–High (TMB-H) (≥16 Mutations/Megabase [mut/Mb]) Solid Tumors

#### Atezolizumab

Target and mechanism. Atezolizumab blocks the interaction of programmed death-ligand 1 (PD-L1) with programmed cell death 1 (PD-1) and CD80 receptors (B7-1Rs).

Current approvals. Atezolizumab is approved for non-small cell lung cancer,[1-5] small-cell lung cancer,[6] hepatocellular carcinoma,[7] melanoma,[8] and alveolar soft part sarcoma.[9]

Supporting study. Atezolizumab was evaluated in a phase IIa, multibasket, MyPathway study. The preplanned primary end point was objective response rate in patients with TMB-H (≥16 mut/Mb) tumors by FoundationOne TMB testing.[10]

Study population. This study included 120 patients with advanced solid tumors with TMB ≥10 mut/Mb by any Clinical Laboratory Improvement Amendments (CLIA)-certified assay. Among patients with local or central FoundationOne TMB testing results, 42 had TMB ≥16 mut/Mb tumors, comprising the primary efficacy population, and 49 had TMB ≥10 and <16 mut/Mb tumors, of whom 48 were efficacy evaluable.[10]

Efficacy. In the primary analysis population of 42 patients with TMB ≥16 mut/Mb tumors, the confirmed objective response rate was 38.1% (95% confidence interval [CI], 23.6%–54.4%) and the disease-control rate (the best response of complete response, partial response, or stable disease >4 months) was 61.9% (95% CI, 45.6%–76.4%), with a median follow-up of 9.9 months.[10][Level of evidence C3]

### References

Felip E, Altorki N, Zhou C, et al.: Adjuvant atezolizumab after adjuvant chemotherapy in resected stage IB-IIIA non-small-cell lung cancer (IMpower010): a randomised, multicentre, open-label, phase 3 trial. Lancet 398 (10308): 1344-1357, 2021.34555333
Herbst RS, Giaccone G, de Marinis F, et al.: Atezolizumab for First-Line Treatment of PD-L1-Selected Patients with NSCLC. N Engl J Med 383 (14): 1328-1339, 2020.32997907
Socinski MA, Jotte RM, Cappuzzo F, et al.: Atezolizumab for First-Line Treatment of Metastatic Nonsquamous NSCLC. N Engl J Med 378 (24): 2288-2301, 2018.29863955
West H, McCleod M, Hussein M, et al.: Atezolizumab in combination with carboplatin plus nab-paclitaxel chemotherapy compared with chemotherapy alone as first-line treatment for metastatic non-squamous non-small-cell lung cancer (IMpower130): a multicentre, randomised, open-label, phase 3 trial. Lancet Oncol 20 (7): 924-937, 2019.31122901
Rittmeyer A, Barlesi F, Waterkamp D, et al.: Atezolizumab versus docetaxel in patients with previously treated non-small-cell lung cancer (OAK): a phase 3, open-label, multicentre randomised controlled trial. Lancet 389 (10066): 255-265, 2017.27979383
Horn L, Mansfield AS, Szczęsna A, et al.: First-Line Atezolizumab plus Chemotherapy in Extensive-Stage Small-Cell Lung Cancer. N Engl J Med 379 (23): 2220-2229, 2018.30280641
Finn RS, Qin S, Ikeda M, et al.: Atezolizumab plus Bevacizumab in Unresectable Hepatocellular Carcinoma. N Engl J Med 382 (20): 1894-1905, 2020.32402160
Ascierto PA, Stroyakovskiy D, Gogas H, et al.: Overall survival with first-line atezolizumab in combination with vemurafenib and cobimetinib in BRAFV600 mutation-positive advanced melanoma (IMspire150): second interim analysis of a multicentre, randomised, phase 3 study. Lancet Oncol 24 (1): 33-44, 2023.36460017
Chen AP, Sharon E, O'Sullivan-Coyne G, et al.: Atezolizumab for Advanced Alveolar Soft Part Sarcoma. N Engl J Med 389 (10): 911-921, 2023.37672694
Friedman CF, Hainsworth JD, Kurzrock R, et al.: Atezolizumab Treatment of Tumors with High Tumor Mutational Burden from MyPathway, a Multicenter, Open-Label, Phase IIa Multiple Basket Study. Cancer Discov 12 (3): 654-669, 2022.34876409

## Latest Updates to This Summary (02/12/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Introduction

Revised the list of U.S. Food and Drug Administration–approved tissue-agnostic therapies to include repotrectinib.

NTRK Gene Fusion–Positive Solid Tumors

Added Repotrectinib as a new subsection.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about tissue-agnostic therapy for cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewer for Agnostic Cancer Therapies is:

- Jacob Adashek, DO (Consultant)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Agnostic Cancer Therapies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/types/agnostic-cancer-therapies-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 38771926]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).